# Childhood Acute Myeloid Leukemia/Other Myeloid Malignancies Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of childhood acute myeloid leukemia and other myeloid malignancies. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## General Information About Childhood Acute Myeloid Leukemia and Other Myeloid Malignancies

Key Points for This Section
- Childhood acute myeloid leukemia (AML) is a type of cancer in which the bone marrow makes a large number of abnormal blood cells.
- Leukemia and other diseases of the blood and bone marrow may affect red blood cells, white blood cells, and platelets.
- Other myeloid diseases can affect the blood and bone marrow.
  - Transient abnormal myelopoiesis (TAM)
  - Acute promyelocytic leukemia (APL)
  - Juvenile myelomonocytic leukemia (JMML)
  - Chronic myelogenous leukemia (CML)
  - Myelodysplastic syndromes (MDS)
- AML or MDS may occur after treatment with certain chemotherapy drugs and/or radiation therapy.
- The risk factors for childhood acute myeloid leukemia and other myeloid malignancies are similar.
- Signs and symptoms of childhood acute myeloid leukemia and other myeloid malignancies include fever, feeling tired, and easy bleeding or bruising.
- Tests that examine the blood and bone marrow are used to diagnose and find any spread of childhood acute myeloid leukemia and other myeloid malignancies.
- Certain factors affect prognosis (chance of recovery) and treatment options.

### Childhood acute myeloid leukemia (AML) is a type of cancer in which the bone marrow makes a large number of abnormal blood cells.

Childhood acute myeloid leukemia (AML) is a cancer of the blood and bone marrow. AML is also called acute myelogenous leukemia and acute nonlymphocytic leukemia. Cancers that are acute usually get worse quickly if they are not treated. Cancers that are chronic usually get worse slowly.

Anatomy of the bone. The bone is made up of compact bone, spongy bone, and bone marrow. Compact bone makes up the outer layer of the bone. Spongy bone is found mostly at the ends of bones and contains red marrow. Bone marrow is found in the center of most bones and has many blood vessels. There are two types of bone marrow: red and yellow. Red marrow contains blood stem cells that can become red blood cells, white blood cells, or platelets. Yellow marrow is made mostly of fat.

Anatomy of the bone; drawing shows spongy bone, red marrow, and yellow marrow. A cross section of the bone shows compact bone and blood vessels in the bone marrow. Also shown are red blood cells, white blood cells, platelets, and a blood stem cell.

This summary is about the treatment of childhood AML, transient abnormal myelopoiesis, childhood acute promyelocytic leukemia, juvenile myelomonocytic leukemia, childhood chronic myelogenous leukemia, and childhood myelodysplastic syndromes. For information about the treatment of childhood acute lymphoblastic leukemia, see Childhood Acute Lymphoblastic Leukemia Treatment.

### Leukemia and other diseases of the blood and bone marrow may affect red blood cells, white blood cells, and platelets.

In healthy children, the bone marrow makes blood stem cells (immature cells) that become mature blood cells over time. A blood stem cell may become a myeloid stem cell or a lymphoid stem cell. A lymphoid stem cell becomes a type of white blood cell.

A myeloid stem cell becomes one of three types of mature blood cells:

- Red blood cells that carry oxygen and other substances to all tissues of the body.
- Granulocytes, which are white blood cells that help fight infection and disease.
- Platelets that form blood clots to stop bleeding.

Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.

Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B-lymphocyte, T-lymphocyte, or natural killer cell.

In AML, the myeloid stem cells usually become a type of immature white blood cell called myeloblasts (or myeloid blasts). The myeloblasts, or leukemia cells, in AML are abnormal and do not become healthy white blood cells. The leukemia cells can build up in the blood and bone marrow so there is less room for healthy white blood cells, red blood cells, and platelets. This may lead to infection, anemia, or easy bleeding.

The leukemia cells can spread outside the blood to other parts of the body, including the central nervous system (brain and spinal cord), skin, and gums. Sometimes leukemia cells form a solid tumor called a myeloid sarcoma. Myeloid sarcoma is also called granulocytic sarcoma or chloroma.

### Other myeloid diseases can affect the blood and bone marrow.

#### Transient abnormal myelopoiesis (TAM)

TAM is a disorder of the bone marrow that can develop in newborns who have Down syndrome. TAM usually goes away on its own within the first 3 months of life. Infants who have TAM have an increased chance of developing AML before the age of 3 years. TAM is also called transient myeloproliferative disorder or transient leukemia.

#### Acute promyelocytic leukemia (APL)

APL is a subtype of AML. In APL, some genes on chromosome 15 switch places with some genes on chromosome 17 and an abnormal gene called PML-RARA is made. The PML-RARA gene sends a message that stops promyelocytes (a type of white blood cell) from maturing. The promyelocytes (leukemia cells) can build up in the blood and bone marrow so there is less room for healthy white blood cells, red blood cells, and platelets. Problems with severe bleeding and blood clots may also occur. This is a serious health problem that needs treatment as soon as possible.

#### Juvenile myelomonocytic leukemia (JMML)

JMML is a rare childhood cancer that is most common in children around the age of 2 years and is more common in boys. In JMML, too many myeloid blood stem cells become myelocytes and monocytes (two types of white blood cells). Some of these myeloid blood stem cells never become mature white blood cells. These immature cells, called blasts, are unable to do their usual work. Over time, the myelocytes, monocytes, and blasts crowd out the healthy white blood cells, red blood cells, and platelets in the bone marrow. When this happens, infection, anemia, or easy bleeding may occur.

#### Chronic myelogenous leukemia (CML)

CML often begins in an early myeloid blood cell when a certain gene change occurs. A section of genes, that includes the ABL gene, on chromosome 9 changes place with a section of genes on chromosome 22, which has the BCR gene. This makes a very short chromosome 22 (called the Philadelphia chromosome) and a very long chromosome 9. An abnormal BCR-ABL gene is formed on chromosome 22. The BCR-ABL gene tells the blood cells to make too much of a protein called tyrosine kinase. Tyrosine kinase causes too many abnormal white blood cells (leukemia cells) to be made in the bone marrow. The leukemia cells can build up in the blood and bone marrow so there is less room for healthy white blood cells, red blood cells, and platelets. This can lead to infection, anemia, or easy bleeding. CML is rare in children.

The Philadelphia (Ph) chromosome is an abnormal chromosome that is made when pieces of chromosomes 9 and 22 break off and trade places. The ABL1 gene from chromosome 9 joins to the BCR gene on chromosome 22 to form the BCR::ABL1 fusion gene. The changed chromosome 22 with the fusion gene on it is called the Ph chromosome.

Philadelphia chromosome; three-panel drawing shows a piece of chromosome 9 and a piece of chromosome 22 breaking off and trading places, creating a changed chromosome 22 called the Philadelphia chromosome. In the left panel, the drawing shows a normal chromosome 9 with the ABL1 gene and a normal chromosome 22 with the BCR gene. In the center panel, the drawing shows part of the ABL1 gene breaking off from chromosome 9 and a piece of chromosome 22 breaking off, below the BCR gene. In the right panel, the drawing shows chromosome 9 with the piece from chromosome 22 attached. It also shows a shortened version of chromosome 22 with the piece from chromosome 9 containing part of the ABL1 gene attached. The ABL1 gene joins to the BCR gene on chromosome 22 to form the BCR::ABL1 fusion gene. The changed chromosome 22 with the BCR::ABL1 fusion gene on it is called the Philadelphia chromosome.

#### Myelodysplastic syndromes (MDS)

MDS occur less often in children than in adults. In MDS, the bone marrow makes too few red blood cells, white blood cells, and platelets. These blood cells may not mature and enter the blood. The type of MDS depends on the type of blood cell that is affected.

The treatment for MDS depends on how low the numbers of red blood cells, white blood cells, or platelets are. Over time, MDS may become AML.

### AML or MDS may occur after treatment with certain chemotherapy drugs and/or radiation therapy.

Cancer treatment with certain chemotherapy drugs and/or radiation therapy may cause therapy-related AML (t-AML) or therapy-related MDS (t-MDS). The risk of these therapy-related myeloid diseases depends on the total dose of the chemotherapy drugs used and the radiation dose and treatment field. Some patients also have an inherited risk for t-AML and t-MDS. These therapy-related diseases usually occur within 7 years after treatment, but are rare in children.

### The risk factors for childhood acute myeloid leukemia and other myeloid malignancies are similar.

Anything that increases your risk of getting a disease is called a risk factor. Having a risk factor does not mean that you will get cancer; not having risk factors doesn’t mean that you will not get cancer. Talk with your child’s doctor if you think your child may be at risk. These and other factors may increase the risk of childhood AML, APL, JMML, CML, and MDS:

- Having a brother or sister, especially a twin, with leukemia.
- Having a personal history of bone marrow failure.
- Having a personal history of MDS.
- Past treatment with chemotherapy or radiation therapy.
- Being exposed to ionizing radiation or chemicals such as benzene.
- Having certain syndromes or inherited disorders, such as:
  - Down syndrome.
  - Aplastic anemia.
  - Fanconi anemia.
  - Neurofibromatosis type 1.
  - Noonan syndrome.
  - Shwachman-Diamond syndrome.
  - Diamond-Blackfan anemia.
  - Dyskeratosis congenita.
  - Li-Fraumeni syndrome.

### Signs and symptoms of childhood acute myeloid leukemia and other myeloid malignancies include fever, feeling tired, and easy bleeding or bruising.

These and other signs and symptoms may be caused by childhood AML, APL, JMML, CML, or MDS or by other conditions. Check with a doctor if your child has any of the following:

- Fever with or without an infection.
- Drenching night sweats.
- Shortness of breath.
- Weakness, feeling tired, or looking pale.
- Easy bruising or bleeding.
- Petechiae (flat, pinpoint spots under the skin caused by bleeding).
- Bone or joint pain.
- Pain or feeling of fullness below the ribs.
- Painless lumps in the neck, underarm, stomach, groin, or other parts of the body. In childhood AML, these lumps, called leukemia cutis, may be blue or purple.
- Painless lumps that are sometimes around the eyes. These lumps, called myeloid sarcomas, are sometimes seen in childhood AML and may be blue-green.
- An eczema-like skin rash.
- Loss of appetite or weight loss.
- Headache, trouble seeing, or confusion.

The signs and symptoms of TAM may include the following:

- Swelling all over the body.
- Shortness of breath.
- Trouble breathing.
- Increased heart rate.
- Weakness, feeling tired, or looking pale.
- Easy bleeding or bruising.
- Petechiae (flat, pinpoint spots under the skin caused by bleeding).
- Pain below the ribs.
- Skin rash.
- Jaundice (yellowing of the skin and whites of the eyes).

Sometimes TAM does not cause any symptoms at all and is diagnosed after a routine blood test.

### Tests that examine the blood and bone marrow are used to diagnose and find any spread of childhood acute myeloid leukemia and other myeloid malignancies.

The following tests and procedures may be used:

- Physical exam and health history: An exam of the body to check general signs of health, including checking for signs of disease, such as lumps or anything else that seems unusual. A history of the patient’s health habits and past illnesses and treatments will also be taken.
- Complete blood count (CBC) with differential: A procedure in which a sample of blood is drawn and checked for the following:
  - The number of red blood cells and platelets.
  - The number and type of white blood cells.
  - The portion of the blood sample made up of red blood cells.
  - The amount of hemoglobin (the protein that carries oxygen) in the red blood cells.
  Complete blood count (CBC). Blood is collected by inserting a needle into a vein and allowing the blood to flow into a tube. The blood sample is sent to the laboratory and the red blood cells, white blood cells, and platelets are counted. The CBC is used to test for, diagnose, and monitor many different conditions.
  Complete blood count (CBC); left panel shows blood being drawn from a vein on the inside of the elbow using a tube attached to a syringe; right panel shows a laboratory test tube with blood cells separated into layers: plasma, white blood cells, platelets, and red blood cells.
- Chest x-ray: An x-ray of the organs and bones inside the chest. An x-ray is a type of energy beam that can go through the body and onto film, making a picture of areas inside the body.
- Biopsy: The removal of cells or tissues so they can be viewed under a microscope by a pathologist to check for signs of cancer. Biopsies that may be done include the following:
  - Bone marrow aspiration and biopsy: The removal of bone marrow and a small piece of bone by inserting a hollow needle into the hipbone or breastbone.
    Bone marrow aspiration and biopsy. After a small area of skin is numbed, a bone marrow needle is inserted into the child’s hip bone. Samples of blood, bone, and bone marrow are removed for examination under a microscope.
    Bone marrow aspiration and biopsy; drawing shows a child lying face down on a table and a bone marrow needle being inserted into the right hip bone. An inset shows the bone marrow needle being inserted through the skin into the bone marrow of the hip bone.
  - Tumor biopsy for AML: The removal of cells or tissues from a lump in the testicles, ovaries, or skin using a needle. This may be done if the doctor suspects the leukemia cells may have formed a solid tumor called a myeloid sarcoma.
- Immunophenotyping: A laboratory test that uses antibodies to identify cancer cells based on the types of antigens or markers on the surface of the cells. This test is used to help diagnose specific types of leukemia.
- Cytogenetic analysis: A laboratory test in which the chromosomes of cells in a sample of blood or bone marrow are counted and checked for any changes, such as broken, missing, rearranged, or extra chromosomes. Changes in certain chromosomes may be a sign of cancer. Cytogenetic analysis is used to help diagnose cancer, plan treatment, or find out how well treatment is working.
  The following test is a type of cytogenetic analysis:
  - FISH (fluorescence in situ hybridization): A laboratory test used to look at and count genes or chromosomes in cells and tissues. Pieces of DNA that contain fluorescent dyes are made in the laboratory and added to a sample of a patient’s cells or tissues. When these dyed pieces of DNA attach to certain genes or areas of chromosomes in the sample, they light up when viewed under a fluorescent microscope. The FISH test is used to help diagnose cancer and help plan treatment.
- Molecular testing: A laboratory test to check for certain genes, proteins, or other molecules in a sample of tissue, blood, or bone marrow. Molecular tests also check for certain changes in a gene or chromosome that may cause or affect the chance of developing AML. A molecular test may be used to help plan treatment, find out how well treatment is working, or make a prognosis.
- Lumbar puncture: A procedure used to collect a sample of cerebrospinal fluid (CSF) from the spinal column. This is done by placing a needle between two bones in the spine and into the CSF around the spinal cord and removing a sample of the fluid. The sample of CSF is checked under a microscope for signs that leukemia cells have spread to the brain and spinal cord. This procedure is also called an LP or spinal tap.
  Lumbar puncture. A patient lies in a curled position on a table. After a small area on the lower back is numbed, a spinal needle (a long, thin needle) is inserted into the lower part of the spinal column to remove cerebrospinal fluid (CSF, shown in blue). The fluid may be sent to a laboratory for testing.
  Lumbar puncture; drawing shows a patient lying in a curled position on a table and a spinal needle (a long, thin needle) being inserted into the lower back. Inset shows a close-up of the spinal needle inserted into the cerebrospinal fluid (CSF) in the lower part of the spinal column.

### Certain factors affect prognosis (chance of recovery) and treatment options.

The prognosis and treatment options for childhood acute myeloid leukemia (AML) depend on the following:

- The age of the child when the cancer is diagnosed.
- The race or ethnic group of the child.
- Whether the child is greatly overweight.
- Number of white blood cells in the blood at diagnosis.
- Whether the AML occurred after previous cancer treatment.
- The subtype of AML.
- Whether there are certain chromosome or gene changes in the leukemia cells.
- Whether the child has Down syndrome. Most children with AML and Down syndrome can be cured of their leukemia when diagnosed before age 4 years.
- Whether the leukemia is in the central nervous system (brain and spinal cord).
- How quickly the leukemia responds to treatment.
- Whether the AML is newly diagnosed (untreated) or has recurred after treatment.
- The length of time since treatment ended, for AML that has recurred.

The prognosis and treatment options for childhood acute promyelocytic leukemia (APL) depends on the following:

- Number of white blood cells in the blood at diagnosis.
- Whether there are certain chromosome or gene changes in the leukemia cells.
- Whether the APL is newly diagnosed (untreated) or has recurred after treatment.

The prognosis and treatment options for juvenile myelomonocytic leukemia (JMML) depend on the following:

- The age of the child when the cancer is diagnosed.
- The type of gene affected and the number of genes that have changes.
- How many platelets are in the blood after treatment.
- How much hemoglobin is in the blood after treatment.
- Whether the JMML is newly diagnosed (untreated) or has recurred after treatment.

The prognosis and treatment options for childhood chronic myelogenous leukemia (CML) depend on the following:

- How long it has been since the patient was diagnosed.
- How many blast cells are in the blood.
- Whether and how fully the blast cells disappear from the blood and bone marrow after therapy has started.
- Whether the CML is newly diagnosed (untreated) or has recurred after treatment.

The prognosis and treatment options for myelodysplastic syndromes (MDS) depend on the following:

- Whether the MDS was caused by previous cancer treatment.
- How low the numbers of red blood cells, white blood cells, or platelets are.
- Whether the MDS is newly diagnosed (untreated) or has recurred after treatment.

## Stages of Childhood Acute Myeloid Leukemia and Other Myeloid Malignancies

Key Points for This Section
- There is no standard staging system for childhood acute myeloid leukemia and other myelogenous malignancies.
- Sometimes childhood acute myeloid leukemia and other myeloid malignancies do not respond to treatment or come back after treatment.

### There is no standard staging system for childhood acute myeloid leukemia and other myelogenous malignancies.

The extent or spread of cancer is usually described as stages. Instead of stages, treatment is based on one or more of the following:

- The type of disease or the subtype of AML.
- Whether leukemia has spread outside the blood and bone marrow.
- Whether the disease is newly diagnosed, in remission, or recurrent.

Newly diagnosed childhood AML

Newly diagnosed childhood AML is cancer that has not been treated except to relieve signs and symptoms such as fever, bleeding, or pain, and has one of the following:

- More than 20% of the cells in the bone marrow are blasts (leukemia cells).
  or
- Less than 20% of the cells in the bone marrow are blasts and there is a certain change in the chromosome.

Childhood AML in remission

In childhood AML in remission, the disease has been treated and the following are found:

- The complete blood count is almost normal.
- Less than 5% of the cells in the bone marrow are blasts (leukemia cells).
- There are no signs or symptoms of leukemia in the brain, spinal cord, or other parts of the body.

### Sometimes childhood acute myeloid leukemia and other myeloid malignancies do not respond to treatment or come back after treatment.

Refractory leukemia is cancer that does not respond to treatment.

Recurrent leukemia is cancer that has recurred (come back) after it has been treated. The cancer may come back in the blood and bone marrow or in other parts of the body, such as the central nervous system (brain and spinal cord).

## Treatment Option Overview

Key Points for This Section
- There are different types of treatment for children with acute myeloid leukemia and other myeloid malignancies.
- Treatment is planned by a team of health care providers who are experts in treating childhood leukemia and other diseases of the blood.
- The treatment of childhood AML and other myeloid malignancies usually has two phases.
- Seven types of standard treatment may be used for childhood AML and other myeloid malignancies.
  - Chemotherapy
  - Radiation therapy
  - Stem cell transplant
  - Targeted therapy
  - Other drug therapy
  - Watchful waiting
  - Supportive care
- New types of treatment are being tested in clinical trials.
- Treatment for childhood acute myeloid leukemia and other myeloid malignancies may cause side effects.
- Patients may want to think about taking part in a clinical trial.
- Patients can enter clinical trials before, during, or after starting their cancer treatment.
- Follow-up tests may be needed.

### There are different types of treatment for children with acute myeloid leukemia and other myeloid malignancies.

Different types of treatment are available for children with acute myeloid leukemia (AML), transient abnormal myelopoiesis (TAM), acute promyelocytic leukemia (APL), juvenile myelomonocytic leukemia (JMML), chronic myelogenous leukemia (CML), and myelodysplastic syndromes (MDS). Some treatments are standard (the currently used treatment), and some are being tested in clinical trials. A treatment clinical trial is a research study meant to help improve current treatments or obtain information on new treatments for patients with cancer. When clinical trials show that a new treatment is better than the standard treatment, the new treatment may become the standard treatment.

Because AML and other myeloid disorders are rare in children, taking part in a clinical trial should be considered. Some clinical trials are open only to patients who have not yet started treatment.

### Treatment is planned by a team of health care providers who are experts in treating childhood leukemia and other diseases of the blood.

Treatment will be overseen by a pediatric oncologist, a doctor who specializes in treating children with cancer. The pediatric oncologist works with other health care providers who are experts in treating children with leukemia and who specialize in certain areas of medicine. These may include the following specialists:

- Pediatrician.
- Hematologist.
- Medical oncologist.
- Pediatric surgeon.
- Radiation oncologist.
- Neurologist.
- Neuropathologist.
- Neuroradiologist.
- Pediatric nurse specialist.
- Social worker.
- Rehabilitation specialist.
- Psychologist.

### The treatment of childhood AML and other myeloid malignancies usually has two phases.

The treatment of childhood AML is done in phases:

- Induction therapy: This is the first phase of treatment. The goal is to kill the leukemia cells in the blood and bone marrow. This puts the leukemia into remission.
- Consolidation/intensification therapy: This is the second phase of treatment. It begins once the leukemia is in remission. The goal of therapy is to kill any remaining leukemia cells that are hiding and may not be active but could begin to regrow and cause a relapse.

Treatment called central nervous system (CNS) prophylaxis therapy may be given during the induction phase of therapy. Because standard doses of chemotherapy may not reach leukemia cells in the CNS (brain and spinal cord), the leukemia cells are able to hide in the CNS. Intrathecal chemotherapy is able to reach leukemia cells in the CNS. It is given to kill the leukemia cells and lessen the chance the leukemia will recur (come back).

The treatment of childhood APL includes a third phase called maintenance. The goal of maintenance is to kill any remaining leukemia cells that may regrow and cause a relapse. Often the cancer treatments are given in lower doses than those used during the remission induction and consolidation/intensification phases.

### Seven types of standard treatment may be used for childhood AML and other myeloid malignancies.

#### Chemotherapy

Chemotherapy is a cancer treatment that uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing. When chemotherapy is taken by mouth or injected into a vein or muscle, the drugs enter the bloodstream and can reach cancer cells throughout the body (systemic chemotherapy). When chemotherapy is placed directly into the cerebrospinal fluid (intrathecal chemotherapy), an organ, or a body cavity such as the abdomen, the drugs mainly affect cancer cells in those areas (regional chemotherapy). Combination chemotherapy is treatment using more than one chemotherapy drug.

The way the chemotherapy is given depends on the type of cancer being treated. In AML, chemotherapy given by mouth, vein, or into the cerebrospinal fluid is used.

In AML, the leukemia cells may spread to the brain and/or spinal cord. Chemotherapy given by mouth or vein to treat AML may not cross the blood-brain barrier to get into the fluid that surrounds the brain and spinal cord. Instead, chemotherapy is injected into the fluid-filled space to kill leukemia cells that may have spread there (intrathecal chemotherapy).

Intrathecal chemotherapy. Anticancer drugs are injected into the intrathecal space, which is the space that holds the cerebrospinal fluid (CSF, shown in blue). There are two different ways to do this. One way, shown in the top part of the figure, is to inject the drugs into an Ommaya reservoir (a dome-shaped container that is placed under the scalp during surgery; it holds the drugs as they flow through a small tube into the brain). The other way, shown in the bottom part of the figure, is to inject the drugs directly into the CSF in the lower part of the spinal column, after a small area on the lower back is numbed.

Intrathecal chemotherapy; drawing shows the cerebrospinal fluid (CSF) in the brain and spinal cord, and an Ommaya reservoir (a dome-shaped container that is placed under the scalp during surgery; it holds the drugs as they flow through a small tube into the brain). Top section shows a syringe and needle injecting anticancer drugs into the Ommaya reservoir. Bottom section shows a syringe and needle injecting anticancer drugs directly into the cerebrospinal fluid in the lower part of the spinal column.

See Drugs Approved for Acute Myeloid Leukemia (https://www.cancer.gov/about-cancer/treatment/drugs/leukemia#3) for more information.

#### Radiation therapy

Radiation therapy is a cancer treatment that uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. External radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer.

In childhood AML, external radiation therapy may be used to treat a myeloid sarcoma that does not respond to chemotherapy.

#### Stem cell transplant

Chemotherapy is given to kill cancer cells or other abnormal blood cells. Healthy cells, including blood-forming cells, are also destroyed by the cancer treatment. Stem cell transplant is a treatment to replace the blood-forming cells. Stem cells (immature blood cells) are removed from the blood or bone marrow of the patient or a donor and are frozen and stored. After the patient completes chemotherapy, the stored stem cells are thawed and given to the patient through an infusion. These reinfused stem cells grow into (and restore) the body's blood cells.

Donor stem cell transplant. (Step 1): Four to five days before donor stem cell collection, the donor receives a medicine to increase the number of stem cells circulating through their bloodstream (not shown). The blood-forming stem cells are then collected from the donor through a large vein in their arm. The blood flows through an apheresis machine that removes the stem cells. The rest of the blood is returned to the donor through a vein in their other arm. (Step 2): The patient receives chemotherapy to kill cancer cells and prepare their body for the donor stem cells. The patient may also receive radiation therapy (not shown). (Step 3): The patient receives an infusion of the donor stem cells.

Donor stem cell transplant; (Panel 1): Drawing of stem cells being collected from a donor's bloodstream using an apheresis machine. Blood is removed from a vein in the donor's arm and flows through the machine where the stem cells are removed. The rest of the blood is then returned to the donor through a vein in their other arm. (Panel 2): Drawing of a health care provider giving a patient an infusion of chemotherapy through a catheter in the patient's chest. The chemotherapy is given to kill cancer cells and prepare the patient's body for the donor stem cells. (Panel 3): Drawing of a patient receiving an infusion of the donor stem cells through a catheter in the chest.

#### Targeted therapy

Targeted therapy is a type of treatment that uses drugs or other substances to identify and attack specific cancer cells. Targeted therapies usually cause less harm to normal cells than chemotherapy or radiation therapy do. Types of targeted therapy include the following:

- Tyrosine kinase inhibitor therapy: This treatment blocks the enzyme, tyrosine kinase, that causes stem cells to become more white blood cells (blasts) than the body needs. Tyrosine kinase inhibitors may be used with chemotherapy drugs as adjuvant therapy (treatment given after the initial treatment, to lower the risk that the cancer will come back).
  - Imatinib, dasatinib, and nilotinib are used to treat childhood chronic myelogenous leukemia.
  - Sorafenib, midostaurin, and gilteritinib, which target a mutated (changed) form of a gene called FLT3, are being studied to treat childhood AML.
  - Trametinib is being studied in children with recurrent or refractory juvenile myelomonocytic leukemia.
- Monoclonal antibodies: Monoclonal antibodies are immune system proteins made in the laboratory to treat many diseases, including cancer. As a cancer treatment, these antibodies can attach to a specific target on cancer cells or other cells that may help cancer cells grow. The antibodies are able to then kill the cancer cells, block their growth, or keep them from spreading. Monoclonal antibodies are given by infusion. They may be used alone or to carry drugs, toxins, or radioactive material directly to cancer cells.
  - Gemtuzumab ozogamicin is a type of monoclonal antibody that is attached to a chemotherapy drug. It is used in the treatment of AML.

monoclonal antibodies: how monoclonal antibodies treat cancer

How do monoclonal antibodies work to treat cancer? This video shows how monoclonal antibodies, such as trastuzumab, pembrolizumab, and rituximab, block molecules cancer cells need to grow, flag cancer cells for destruction by the body’s immune system, or deliver harmful substances to cancer cells.

YouTube (https://www.youtube.com/watch?v=dxnjAc-rqz8)

See Drugs Approved for Leukemia (https://www.cancer.gov/about-cancer/treatment/drugs/leukemia) for more information.

#### Other drug therapy

Lenalidomide may be used to lessen the need for transfusions in patients who have myelodysplastic syndromes caused by a specific chromosome change.

Arsenic trioxide and tretinoin are drugs that kill certain types of leukemia cells, stop the leukemia cells from dividing, or help the leukemia cells mature into white blood cells. These drugs are used in the treatment of acute promyelocytic leukemia.

See Drugs Approved for Acute Myeloid Leukemia (https://www.cancer.gov/about-cancer/treatment/drugs/leukemia#3) for more information.

#### Watchful waiting

Watchful waiting is closely monitoring a patient’s condition without giving any treatment until signs or symptoms appear or change. It is sometimes used to treat transient abnormal myelopoiesis (TAM).

#### Supportive care

Supportive care is given to lessen the problems caused by the disease or its treatment. All patients with leukemia receive supportive care treatments. Supportive care may include the following:

- Transfusion therapy: A way of giving red blood cells or platelets to replace blood cells destroyed by disease or cancer treatment. The blood may be donated from another person or it may have been taken from the patient earlier and stored until needed.
- Antifungal agents: Drugs, such as Caspofungin or fluconazole, used to prevent or treat infections caused by a fungus (a type of microorganism). This is important in the care of patients with AML.
- Drug therapy, such as antibiotics.
- Leukapheresis: A procedure in which a special machine is used to remove white blood cells from the blood. Blood is taken from the patient and put through a blood cell separator where the white blood cells are removed. The rest of the blood is then returned to the patient's bloodstream. Leukapheresis is used to treat patients with very high white blood cell counts.

### New types of treatment are being tested in clinical trials.

This summary section describes treatments that are being studied in clinical trials. It may not mention every new treatment being studied. Information about clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment for childhood acute myeloid leukemia and other myeloid malignancies may cause side effects.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Regular follow-up exams are very important. Side effects from cancer treatment that begin after treatment and continue for months or years are called late effects. Late effects of cancer treatment may include the following:

- Physical problems that affect the following:
  - Heart, lung, or endocrine function.
  - Bone development.
  - Fertility (ability to have children).
  - Energy level.
- Changes in mood, feelings, thinking, learning, or memory.
- Second cancers (new types of cancer), such as breast cancer.

Some late effects may be treated or controlled. It is important that parents of children who are treated for AML or other blood diseases talk with their child's doctors about the effects cancer treatment can have on their child. (See the PDQ summary on Late Effects of Treatment for Childhood Cancer for more information).

### Patients may want to think about taking part in a clinical trial.

For some patients, taking part in a clinical trial may be the best treatment choice. Clinical trials are part of the cancer research process. Clinical trials are done to find out if new cancer treatments are safe and effective or better than the standard treatment.

Many of today's standard treatments for cancer are based on earlier clinical trials. Patients who take part in a clinical trial may receive the standard treatment or be among the first to receive a new treatment.

Patients who take part in clinical trials also help improve the way cancer will be treated in the future. Even when clinical trials do not lead to effective new treatments, they often answer important questions and help move research forward.

### Patients can enter clinical trials before, during, or after starting their cancer treatment.

Some clinical trials only include patients who have not yet received treatment. Other trials test treatments for patients whose cancer has not gotten better. There are also clinical trials that test new ways to stop cancer from recurring (coming back) or reduce the side effects of cancer treatment.

Clinical trials are taking place in many parts of the country. Information about clinical trials supported by NCI can be found on NCI’s clinical trials search (https://www.cancer.gov/research/participate/clinical-trials-search) webpage. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

### Follow-up tests may be needed.

As your child goes through treatment, they will have follow-up tests or check-ups. Some tests that were done to diagnose or stage the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the cancer has recurred (come back).

## Treatment of Childhood Acute Myeloid Leukemia

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of newly diagnosed childhood acute myeloid leukemia (AML) during the induction phase may include the following:

- Combination chemotherapy.
- Central nervous system prophylaxis therapy with intrathecal chemotherapy.
- Targeted therapy with a monoclonal antibody (gemtuzumab ozogamicin).
- A clinical trial of targeted therapy (sorafenib).
- A clinical trial of chemotherapy and targeted therapy (gilteritinib).
- Supportive care.

Treatment of childhood AML during the remission phase (consolidation/intensification therapy) depends on the subtype of AML and may include the following:

- Combination chemotherapy.
- High-dose chemotherapy followed by using blood stem cells from a donor.
- Targeted therapy (such as FLT3 inhibitors).

Treatment of refractory childhood AML may include the following:

- Chemotherapy.
- Targeted therapy with a monoclonal antibody (gemtuzumab ozogamicin).
- Radiation therapy to treat a myeloid sarcoma that does not completely respond to chemotherapy.

Treatment of recurrent childhood AML may include the following:

- Combination chemotherapy.
- Targeted therapy with a monoclonal antibody (gemtuzumab ozogamicin).
- Radiation therapy to treat locally recurring myeloid sarcoma.
- A clinical trial of targeted therapy (midostaurin, sorafenib, or gilteritinib).
- Combination chemotherapy and stem cell transplant, for patients who have had a second complete remission.
- A second stem cell transplant, for patients whose disease came back after the first stem cell transplant.

## Treatment of Transient Abnormal Myelopoiesis or Children with Down Syndrome and AML

For information about the treatments listed below, see the Treatment Option Overview section.

Transient abnormal myelopoiesis (TAM) usually goes away on its own. For newly diagnosed TAM that does not go away on its own or causes other health problems, treatment may include the following:

- Supportive care, including transfusion therapy or leukapheresis.
- Chemotherapy.

Treatment of newly diagnosed acute myeloid leukemia (AML) in children aged 4 years or younger who have Down syndrome may include the following:

- Combination chemotherapy plus central nervous system prophylaxis therapy with intrathecal chemotherapy.
- A clinical trial of a new chemotherapy regimen that depends on how the child responds to initial chemotherapy.

Treatment of newly diagnosed AML in children older than 4 years who have Down syndrome may be the same as treatment for children without Down syndrome.

## Treatment of Childhood Acute Promyelocytic Leukemia

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of newly diagnosed childhood acute promyelocytic leukemia (APL) may include the following:

- Tretinoin with arsenic trioxide.
- Tretinoin plus chemotherapy with or without arsenic trioxide.
- Supportive care.

Treatment of childhood APL during the remission phase (consolidation/intensification therapy) may include the following:

- Tretinoin with arsenic trioxide.
- Tretinoin plus chemotherapy with or without arsenic trioxide.

Treatment of childhood APL during the remission phase (maintenance therapy) may include the following:

- Tretinoin with combination chemotherapy.

Treatment of recurrent childhood APL may include the following:

- Arsenic trioxide therapy with or without tretinoin.
- Targeted therapy with a monoclonal antibody (gemtuzumab ozogamicin).
- Stem cell transplant using blood stem cells from the patient or a donor.

## Treatment of Juvenile Myelomonocytic Leukemia

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of newly diagnosed juvenile myelomonocytic leukemia (JMML) may include the following:

- Combination chemotherapy followed by stem cell transplant.

Treatment of refractory or recurrent childhood JMML may include the following:

- A second stem cell transplant, for patients whose disease came back after the first stem cell transplant.
- A clinical trial of targeted therapy with a tyrosine kinase inhibitor (trametinib).

## Treatment of Childhood Chronic Myelogenous Leukemia

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of newly diagnosed chronic myelogenous leukemia (CML) may include the following:

- Targeted therapy with a tyrosine kinase inhibitor (imatinib, dasatinib, or nilotinib).
- A clinical trial to study the rate of CML recurrence after stopping tyrosine kinase inhibitor therapy, and the ability to achieve remission again if CML recurs in children with CML who are in remission for at least 2 years after receiving treatment with the same tyrosine kinase inhibitor for at least 3 years.

Treatment of refractory or recurrent childhood CML may include the following:

- Targeted therapy with a tyrosine kinase inhibitor (dasatinib or nilotinib).
- Stem cell transplant using blood stem cells from a donor.

## Treatment of Childhood Myelodysplastic Syndromes

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of newly diagnosed childhood myelodysplastic syndromes (MDS) may include the following:

- Stem cell transplant using blood stem cells from a donor.
- Supportive care, including transfusion therapy and antibiotics.
- Steroid therapy.
- Lenalidomide therapy, for patients with certain gene changes.

If the MDS becomes acute myeloid leukemia (AML), treatment will be the same as treatment for newly diagnosed AML.

## To Learn More About Childhood Acute Myeloid Leukemia and Other Myeloid Malignancies

For more information from the National Cancer Institute about childhood acute myeloid leukemia and other myeloid malignancies, see the following:

- Drugs Approved for Acute Myeloid Leukemia (https://www.cancer.gov/about-cancer/treatment/drugs/leukemia#3)
- Drugs Approved for Myeloproliferative Neoplasms (https://www.cancer.gov/about-cancer/treatment/drugs/myeloproliferative-neoplasms#1)
- Blood-Forming Stem Cell Transplants (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant/stem-cell-fact-sheet)
- Targeted Cancer Therapies (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies)

For more childhood cancer information and other general cancer resources, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Late Effects of Treatment for Childhood Cancer
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of childhood acute myeloid leukemia and other myeloid malignancies. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Acute Myeloid Leukemia/Other Myeloid Malignancies Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/leukemia/patient/child-aml-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389303]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).